# Metastatic Squamous Neck Cancer With Occult Primary Treatment (PDQ®)

Health Professional Version

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult metastatic squamous neck cancer with occult primary. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board, which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

## General Information About Metastatic Squamous Neck Cancer With Occult Primary

### Diagnosis

The diagnosis of an occult primary tumor is made only when no primary tumor is detected after careful search and when a primary tumor is not revealed during therapy. Patients with cervical lymph node metastases histologically related to a previously treated primary tumor and patients with lymphomas and adenocarcinoma are excluded from this diagnosis. If the biopsy is an undifferentiated carcinoma (in particular, a lymphoepithelioma), the most probable primary site is in the Waldeyer ring; for example, the nasopharynx, base of tongue, or tonsil. Most epidermoid carcinomas that are metastatic to lymph nodes of the upper half of the neck will originate from a head and neck primary site. Squamous carcinomas that are metastatic to the lower neck may represent a primary site in the head and neck, esophagus, lung, or genitourinary tract. A search for primary tumors in these areas must be undertaken before assuming that the primary is occult. Primary tumors arising in the nasopharynx may be secondary to Epstein-Barr virus (EBV) infection, and EBV genomic material may be detectable in cervical nodal tissue after DNA amplification using the polymerase chain reaction. Such a finding should lead to an in-depth search for a primary in the nasopharynx.[1]

The extent of investigation and type of treatment must be individualized depending on the patient's age and wishes, and on the site, histology, and extent of metastatic lymph node involvement of the tumor. A patient with a squamous carcinoma of the neck with occult primary should be checked for other obvious metastatic disease—for example, involving the lung, liver, or bone—because this would affect the locoregional approach to therapy.[2]

### Survival

Three-year disease-free survival rates following surgery and/or radiation therapy for unknown squamous primary tumors range from 40% to 50% in patients with N1 disease to 38% and 26% for patients with N2 and N3 disease, respectively. Patients who later develop primary lesions have poor survival rates compared with patients whose primaries remain occult (30% vs. 60%).

### Follow-Up

Patients with neck metastases from an undetectable primary should be given the benefit of definitive treatment. Despite the ominous situation of an undiscovered primary malignancy, a significant number of patients do achieve cure by both surgical and radiotherapeutic approaches. In some patients, long-term repeat examinations will eventually disclose the primary tumor, and at a treatable stage.

### References

Feinmesser R, Miyazaki I, Cheung R, et al.: Diagnosis of nasopharyngeal carcinoma by DNA amplification of tissue obtained by fine-needle aspiration. N Engl J Med 326 (1): 17-21, 1992.1309196 92072651
de Braud F, al-Sarraf M: Diagnosis and management of squamous cell carcinoma of unknown primary tumor site of the neck. Semin Oncol 20 (3): 273-8, 1993.8503023 93276305

## Cellular Classification of Metastatic Squamous Neck Cancer With Occult Primary

This section helps lead the clinician and pathologist through a differential diagnosis for an unknown primary presenting with cervical node metastases. The therapeutic section, however, relates only to squamous carcinoma and assumes that the primary physician has worked with the pathologist to eliminate other possibilities that would require alternative therapies.

The pathologist plays a central role in evaluating an occult primary tumor. A thorough evaluation of an adequate specimen through histological or immunohistochemical techniques, and, when appropriate, electron microscopy provides guidance for the clinical evaluation that ensues. The pathologist, oncologist, and primary physician should interact closely in conducting this evaluation.

The complexity of the pathological evaluation tends to be inversely related to the degree of differentiation of the tumor. For instance, for tumors that are well or moderately differentiated, the pathological diagnosis of an epithelial cancer is often readily apparent. In contrast, lymphoma, sarcoma, melanoma, or a germ cell tumor are often poorly differentiated and harder to diagnose. Commonly used stains such as mucicarmine or diastase-sensitive Periodic Acid Schiff can be important in confirming the diagnosis of certain tumors of gastrointestinal or renal origin.

For a male patient younger than 50 years with a poorly differentiated tumor, serum levels of beta-human chorionic gonadotropin (beta-hCG) and alpha-fetoprotein (AFP) should be obtained and specimens should be evaluated with immunohistochemical stains for beta-hCG and AFP. Some of these tumors respond to platinum-based combination chemotherapy in a manner similar to extragonadal germ cell malignancies, and this group of patients should consider this treatment unless alternative diagnoses are made.[1]

Special studies can differentiate more poorly differentiated tumors. Often, a generic distinction is important between a poorly differentiated tumor of epithelial, hematopoietic, neuroendocrine, or neuroectodermal origin (i.e., melanoma). These studies include:

- Immunohistochemical. Immunohistochemical studies can be important in making these broad distinctions, in particular, studies that evaluate staining for keratins, leukocyte common antigen, and S-100, a neuroectodermal antigen expressed in melanomas.[2]
- Polymerase chain reaction. In patients with suspected nasopharyngeal carcinoma, DNA amplification of Epstein-Barr virus (EBV) genomes can be used for diagnosis with tissue provided by fine-needle aspiration biopsy. The presence of EBV in metastases from an occult primary tumor suggests the development of overt nasopharyngeal carcinoma.[3]
  Acinar spaces and microacini are seen with adenocarcinomas. Electron dense secretory granules are seen in tumors of neuroectodermal origin. Premelanosomes can be found in most amelanotic melanomas. But these features are generally associated with differentiation along a particular line. Often poorly differentiated tumors do not display such characteristics, and electron microscopy evaluation would be of little value. Approximately 10% of the time, electron microscopy may help distinguish a primary diagnosis not obtained by light microscopy.[4-6]

### References

Hainsworth JD, Wright EP, Gray GF, et al.: Poorly differentiated carcinoma of unknown primary site: correlation of light microscopic findings with response to cisplatin-based combination chemotherapy. J Clin Oncol 5 (8): 1275-80, 1987.2442318 87310571
Battifora H: Recent progress in the immunohistochemistry of solid tumors. Semin Diagn Pathol 1 (4): 251-71, 1984.6400635 88098726
Feinmesser R, Miyazaki I, Cheung R, et al.: Diagnosis of nasopharyngeal carcinoma by DNA amplification of tissue obtained by fine-needle aspiration. N Engl J Med 326 (1): 17-21, 1992.1309196 92072651
Hanna W, Kahn HJ: The ultrastructure of metastatic adenocarcinoma in serous fluids. An aid in identification of the primary site of the neoplasm. Acta Cytol 29 (3): 202-10, 1985 May-Jun.3859120 85221234
Herrera GA, Reimann BE: Electron microscopy in determining origin of metastatic adenocarcinomas. South Med J 77 (12): 1557-66, 1984.6505766 85065937
Mackay B, Ordonez NG: The role of the pathologist in the evaluation of poorly differentiated tumors. Semin Oncol 9 (4): 396-415, 1982.6763334 83197462

## Stage Information for Metastatic Squamous Neck Cancer With Occult Primary

### American Joint Committee on Cancer (AJCC) Stage Groupings and TNM Definitions

For metastatic squamous neck cancer with occult primary, the patient's human papilloma virus (HPV) p16 status or Epstein-Barr virus (EBV) status is used to determine which AJCC staging system is used, as follows:

- If the patient is HPV p16 positive, the staging for p16-positive oropharyngeal cancer, which has different nodal staging, is used. For more information, see the AJCC prognostic stage groups for HPV-mediated (p16-positive) oropharyngeal cancer section in Oropharyngeal Cancer Treatment.
- If the patient is HPV p16 negative, the staging for p16-negative oropharyngeal cancer is used. For more information, see the AJCC prognostic stage groups for p16-negative squamous cancers of the oropharynx section in Oropharyngeal Cancer Treatment.
- If the patient is EBV positive, the staging for nasopharyngeal cancer is used. For more information, see the Stage Information for Nasopharyngeal Carcinoma section in Nasopharyngeal Carcinoma Treatment.

## Treatment of Untreated Metastatic Squamous Neck Cancer With Occult Primary

Patients with untreated metastatic squamous neck cancer with occult primary have had no previous treatment except supportive care. Patients with neck nodes from a presumed unknown primary tumor should be evaluated as follows:

1. Surgical biopsy or excision to establish a histological diagnosis, but only after an aerodigestive tract primary has been carefully ruled out by the following procedures:
  - Direct nasopharyngoscopy, laryngoscopy, bronchoscopy, and esophagoscopy, with biopsy of any suspicious area.
    - If no suspicious lesions are found, random biopsies of the nasopharynx, base of tongue, tonsil, and pyriform sinus on the side of the lesion should be performed.
    - If the tonsil is not present, biopsy of the tonsillar fossa should be performed.
    - Sinus x-rays are probably indicated; if an abnormality is found, it should be biopsied as well.
2. Selected other studies if indicated. Magnetic resonance imaging offers an advantage over computed tomography scans to detect head and neck tumors and to distinguish lymph nodes from blood vessels. It should be considered in the initial evaluation of the patient with metastatic squamous cell cancer in cervical lymph nodes.[1] Positron emission tomography may help determine the primary site.[2]
  Patients should undergo a full course of radiation therapy or adequate neck dissection, when possible. In cases of fixed massive homolateral adenopathy or bilateral nodes, radiation therapy should be administered first. The radiation fields should also include the nasopharynx, base of tongue, and pyriform sinuses. If radiation therapy is the primary mode of treatment and the neck mass persists upon completion of radiation therapy, cervical lymph node dissection should be performed. Patients with metastatic carcinoma in the supraclavicular region are best managed with a full course of radiation therapy, followed by surgical dissection if palpable tumor persists. Careful continued follow-up of these patients is of utmost importance. Depending on the likely site of origin and histology, chemotherapy appropriate to the most treatable site may be indicated.
  Accumulating evidence has demonstrated a high incidence (>30%–40%) of hypothyroidism in patients who receive external-beam radiation therapy to the entire thyroid gland or the pituitary gland. Thyroid function testing of patients should be considered before therapy and as part of posttreatment follow-up.[3,4]

Treatment options for untreated metastatic squamous neck cancer with occult primary include:

1. Radical neck dissection.
2. Radiation therapy.[5,6] Intensity-modulated radiation therapy may have less short- and long-term toxicity than conventional radiation therapy in terms of xerostomia, acute dysphagia, and skin fibrosis.[7,8]
3. Combined surgery and radiation therapy.[9]
4. Chemotherapy followed by radiation therapy (under clinical evaluation).[10]
5. Simultaneous chemotherapy and hyperfractionated radiation therapy (under clinical evaluation).[11]
6. Clinical trials for advanced tumors should be considered.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

### References

Consensus conference. Magnetic resonance imaging. JAMA 259 (14): 2132-8, 1988.3279242 88155850
Rege S, Maass A, Chaiken L, et al.: Use of positron emission tomography with fluorodeoxyglucose in patients with extracranial head and neck cancers. Cancer 73 (12): 3047-58, 1994.8200003 94258674
Turner SL, Tiver KW, Boyages SC: Thyroid dysfunction following radiotherapy for head and neck cancer. Int J Radiat Oncol Biol Phys 31 (2): 279-83, 1995.7836081 95137798
Constine LS: What else don't we know about the late effects of radiation in patients treated for head and neck cancer? Int J Radiat Oncol Biol Phys 31 (2): 427-9, 1995.7836099 95137818
Carlson LS, Fletcher GH, Oswald MJ: Guidelines for radiotherapeutic techniques for cervical metastases from an unknown primary. Int J Radiat Oncol Biol Phys 12 (12): 2101-10, 1986.3793546 87083031
Mack Y, Parsons JT, Mendenhall WM, et al.: Squamous cell carcinoma of the head and neck: management after excisional biopsy of a solitary metastatic neck node. Int J Radiat Oncol Biol Phys 25 (4): 619-22, 1993.8454479 93202966
Madani I, Vakaet L, Bonte K, et al.: Intensity-modulated radiotherapy for cervical lymph node metastases from unknown primary cancer. Int J Radiat Oncol Biol Phys 71 (4): 1158-66, 2008.18258383
Sher DJ, Balboni TA, Haddad RI, et al.: Efficacy and toxicity of chemoradiotherapy using intensity-modulated radiotherapy for unknown primary of head and neck. Int J Radiat Oncol Biol Phys 80 (5): 1405-11, 2011.21177045
Maulard C, Housset M, Brunel P, et al.: Postoperative radiation therapy for cervical lymph node metastases from an occult squamous cell carcinoma. Laryngoscope 102 (8): 884-90, 1992.1495353 92356745
Thyss A, Schneider M, Santini J, et al.: Induction chemotherapy with cis-platinum and 5-fluorouracil for squamous cell carcinoma of the head and neck. Br J Cancer 54 (5): 755-60, 1986.3801272 87100738
Weissler MC, Melin S, Sailer SL, et al.: Simultaneous chemoradiation in the treatment of advanced head and neck cancer. Arch Otolaryngol Head Neck Surg 118 (8): 806-10, 1992.1642831 92352728

## Treatment of Recurrent Metastatic Squamous Neck Cancer With Occult Primary

The prognosis for most treated patients with progressing, recurring, or relapsing cancer is poor, regardless of cell type or stage. Deciding on further treatment depends on many factors, including the specific cancer, previous treatment, site of recurrence, and individual patient considerations. Treatments that are under clinical evaluation are appropriate and should be considered when possible.

### Current Clinical Trials

Use our advanced clinical trial search (https://www.cancer.gov/research/participate/clinical-trials-search/advanced) to find NCI-supported cancer clinical trials that are now enrolling patients. The search can be narrowed by location of the trial, type of treatment, name of the drug, and other criteria. General information (https://www.cancer.gov/research/participate/clinical-trials) about clinical trials is also available.

## Latest Updates to This Summary (12/19/2024)

The PDQ cancer information summaries are reviewed regularly and updated as new information becomes available. This section describes the latest changes made to this summary as of the date above.

Editorial changes were made to this summary.

This summary is written and maintained by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of NCI. The summary reflects an independent review of the literature and does not represent a policy statement of NCI or NIH. More information about summary policies and the role of the PDQ Editorial Boards in maintaining the PDQ summaries can be found on the About This PDQ Summary and PDQ® Cancer Information for Health Professionals (https://www.cancer.gov/publications/pdq) pages.

## About This PDQ Summary

### Purpose of This Summary

This PDQ cancer information summary for health professionals provides comprehensive, peer-reviewed, evidence-based information about the treatment of adult metastatic squamous neck cancer with occult primary. It is intended as a resource to inform and assist clinicians in the care of their patients. It does not provide formal guidelines or recommendations for making health care decisions.

### Reviewers and Updates

This summary is reviewed regularly and updated as necessary by the PDQ Adult Treatment Editorial Board (https://www.cancer.gov/publications/pdq/editorial-boards/adult-treatment), which is editorially independent of the National Cancer Institute (NCI). The summary reflects an independent review of the literature and does not represent a policy statement of NCI or the National Institutes of Health (NIH).

Board members review recently published articles each month to determine whether an article should:

- be discussed at a meeting,
- be cited with text, or
- replace or update an existing article that is already cited.

Changes to the summaries are made through a consensus process in which Board members evaluate the strength of the evidence in the published articles and determine how the article should be included in the summary.

The lead reviewers for Metastatic Squamous Neck Cancer With Occult Primary Treatment are:

- Andrea Bonetti, MD (Azienda ULSS 9 of the Veneto Region)
- Monaliben Patel, MD (University of Rochester Medical Center)
- Minh Tam Truong, MD (Boston University Medical Center)

Any comments or questions about the summary content should be submitted to Cancer.gov through the NCI website's Email Us (https://www.cancer.gov/contact/email-us). Do not contact the individual Board Members with questions or comments about the summaries. Board members will not respond to individual inquiries.

### Levels of Evidence

Some of the reference citations in this summary are accompanied by a level-of-evidence designation. These designations are intended to help readers assess the strength of the evidence supporting the use of specific interventions or approaches. The PDQ Adult Treatment Editorial Board uses a formal evidence ranking system in developing its level-of-evidence designations.

### Permission to Use This Summary

PDQ is a registered trademark. Although the content of PDQ documents can be used freely as text, it cannot be identified as an NCI PDQ cancer information summary unless it is presented in its entirety and is regularly updated. However, an author would be permitted to write a sentence such as “NCI’s PDQ cancer information summary about breast cancer prevention states the risks succinctly: [include excerpt from the summary].”

The preferred citation for this PDQ summary is:

PDQ® Adult Treatment Editorial Board. PDQ Metastatic Squamous Neck Cancer With Occult Primary Treatment. Bethesda, MD: National Cancer Institute. Updated <MM/DD/YYYY>. Available at: https://www.cancer.gov/types/head-and-neck/hp/adult/metastatic-squamous-neck-treatment-pdq. Accessed <MM/DD/YYYY>. [PMID: 26389364]

Images in this summary are used with permission of the author(s), artist, and/or publisher for use within the PDQ summaries only. Permission to use images outside the context of PDQ information must be obtained from the owner(s) and cannot be granted by the National Cancer Institute. Information about using the illustrations in this summary, along with many other cancer-related images, is available in Visuals Online (https://visualsonline.cancer.gov/), a collection of over 2,000 scientific images.

### Disclaimer

Based on the strength of the available evidence, treatment options may be described as either “standard” or “under clinical evaluation.” These classifications should not be used as a basis for insurance reimbursement determinations. More information on insurance coverage is available on Cancer.gov on the Managing Cancer Care (https://www.cancer.gov/about-cancer/managing-care) page.

### Contact Us

More information about contacting us or receiving help with the Cancer.gov website can be found on our Contact Us for Help (https://www.cancer.gov/contact) page. Questions can also be submitted to Cancer.gov through the website’s Email Us (https://www.cancer.gov/contact/email-us).